# Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers Prevention (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers prevention. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Note: The Overview section summarizes the published evidence on this topic. The rest of the summary describes the evidence in more detail.

Oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers may be referred to as head and neck squamous cell cancers. Head and neck squamous cell cancers most commonly arise from the mucosal surfaces lining the oral cavity, oropharynx, hypopharynx, and larynx. Anatomically, the pharynx includes the nasopharynx, oropharynx, and hypopharynx, but cancers in these sites have distinct clinical and epidemiologic characteristics. Thus, it is inappropriate to group them together.[1] For more information, see the following PDQ summaries:

- Laryngeal Cancer Treatment
- Lip and Oral Cavity Cancer Treatment
- Nasopharyngeal Carcinoma Treatment
- Oropharyngeal Cancer Treatment

Figure 1 shows the anatomy of the pharynx.

Figure 1. Anatomy of the pharynx.

Anatomy of the pharynx; drawing shows the nasopharynx, oropharynx, and hypopharynx. Also shown are the nasal cavity, oral cavity, hyoid bone, larynx, esophagus, and trachea.

### Who Is at Risk?

Head and neck squamous cell cancers have common risk factors. People who use tobacco in any of the commonly available forms (cigarettes, cigars, pipes, and smokeless tobacco) or have a high alcohol intake are at elevated risk of oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers; they are at particularly high risk if they use both tobacco and alcohol.[2] Individuals who chew betel quid (whether mixed with tobacco or not) are also at high risk of cancer of the oral cavity and oropharynx.[3,4] Individuals who have a personal history of cancer of the head and neck region also are at elevated risk of a future primary cancer of the head and neck.[5] Human papillomavirus type 16 (HPV-16) is a sufficient, but not necessary, cause of oral, tongue, and oropharyngeal cancers.[2,6]

Note: Separate PDQ summaries on Oral Cavity and Nasopharyngeal Cancers Screening and Cigarette Smoking: Health Risks and How to Quit are also available.

### Factors With Adequate Evidence of an Increased Risk of Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers

#### Tobacco use

Based on solid evidence from numerous observational studies, tobacco use increases the risk of cancers of the oral cavity, oropharynx, hypopharynx, and larynx.[7-9]

Magnitude of Effect: Large. Risk for current smokers ranges from fourfold to fivefold for oral cavity, oropharyngeal, and hypopharyngeal cancers to tenfold for laryngeal cancer compared with never-smokers, and is dose related. Most cancers of the oral cavity, oropharynx, hypopharynx, and larynx are attributable to the use of tobacco products.

- Study Design: Case-control and cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Alcohol use

Based on solid evidence, alcohol use is a risk factor for the development of head and neck cancers. Its effects are independent of those of tobacco use.[9-12]

Magnitude of Effect: Lower than the risk associated with tobacco use, but the risk is approximately twofold to sixfold for people who drink two or more alcoholic beverages per day compared with nondrinkers, and is dose related.

- Study Design: Case-control and cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Tobacco and alcohol use

The risk of oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers is highest in people who consume large amounts of both alcohol and tobacco. When both risk factors are present, the risk of cancer is greater than a simple multiplicative effect of the two individual risks.[13-15]

Magnitude of Effect: About two to three times greater for oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers than the simple multiplicative effect, with risks for persons who both smoke and drink heavily approximately 5- to 14-fold that of persons who both never smoke and never drink.

- Study Design: Case-control and cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Betel-quid chewing

Based on solid evidence, chewing betel quid alone or with added tobacco increases the risk of both oral cavity and oropharyngeal cancers.[3,4] Of the three primary components of betel quid (betel leaf, areca nut, and lime), the areca nut is the only one considered to be carcinogenic when chewed.

Magnitude of Effect: Relative risks for oral cavity cancer are high and typically stronger for betel quid with tobacco than for betel quid alone. Both products appear to confer a statistically significant increase in risk of oropharyngeal cancer.[4]

- Study Design: Case-control, and cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Human papillomavirus (HPV) infection

Based on solid evidence, HPV type 16 (HPV-16) infection causes oropharyngeal cancer.[6,16] Other high-risk HPV subtypes, including HPV type 18 (HPV-18), have been found in a small percentage of oropharyngeal cancers.[17,18]

Magnitude of Effect: Large. Oral infection with HPV-16 confers about a 15-fold increase in risk of oropharyngeal cancer relative to individuals without oral HPV-16 infection.

- Study Design: Case-control and cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

### Interventions With Adequate Evidence of a Decreased Risk of Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers

#### Tobacco cessation

Based on solid evidence, cessation of exposure to tobacco (e.g., cigarettes, pipes, cigars, and smokeless tobacco) leads to a decrease in the risk of oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers.[19]

Magnitude of Effect: Decreased risk, moderate to large magnitude.

- Study Design: Case-control and cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

### Interventions With Inadequate Evidence of a Reduced Risk of Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers

#### Cessation of alcohol consumption

Based on fair evidence, cessation of alcohol consumption leads to a decrease in oral cavity and laryngeal cancer risk 20 years or more after cessation.[19]

Magnitude of Effect: Decreased risk, small to moderate magnitude.

- Study Design: Case-control studies.
- Internal Validity: Fair.
- Consistency: Fair.
- External Validity: Fair.

#### Vaccination against HPV-16 and the other high-risk subtypes

Vaccination against HPV-16 and HPV-18 has been shown to prevent approximately 90% of oral HPV-16/HPV-18 infections within 4 years of vaccination.[20] However, no data are available to assess whether vaccination at any age will lead to reduced risk of oropharyngeal cancer at current typical ages of diagnosis.[21]

- Study Design: No studies available.
- Internal Validity: Not applicable (N/A).
- Consistency: N/A.
- External Validity: N/A.

### References

IARC Working Group on the Evaluation of Carcinogenic Risks to Humans: Personal habits and indoor combustions. Volume 100 E. A review of human carcinogens. IARC Monogr Eval Carcinog Risks Hum 100 (Pt E): 1-538, 2012.23193840
Castellsagué X, Alemany L, Quer M, et al.: HPV Involvement in Head and Neck Cancers: Comprehensive Assessment of Biomarkers in 3680 Patients. J Natl Cancer Inst 108 (6): djv403, 2016.26823521
Song H, Wan Y, Xu YY: Betel quid chewing without tobacco: a meta-analysis of carcinogenic and precarcinogenic effects. Asia Pac J Public Health 27 (2): NP47-57, 2015.23666841
Guha N, Warnakulasuriya S, Vlaanderen J, et al.: Betel quid chewing and the risk of oral and oropharyngeal cancers: a meta-analysis with implications for cancer control. Int J Cancer 135 (6): 1433-43, 2014.24302487
Atienza JA, Dasanu CA: Incidence of second primary malignancies in patients with treated head and neck cancer: a comprehensive review of literature. Curr Med Res Opin 28 (12): 1899-909, 2012.23121148
Kreimer AR, Johansson M, Waterboer T, et al.: Evaluation of human papillomavirus antibodies and risk of subsequent head and neck cancer. J Clin Oncol 31 (21): 2708-15, 2013.23775966
U.S. Department of Health and Human Services: The Health Consequences of Smoking—50 Years of Progress: A Report of the Surgeon General. U.S. Department of Health and Human Services, CDC, National Center for Chronic Disease Prevention and Health Promotion, Office on Smoking and Health, 2014. Also available online (https://www.ncbi.nlm.nih.gov/books/NBK179276/). Last accessed December 30, 2024.
Vineis P, Alavanja M, Buffler P, et al.: Tobacco and cancer: recent epidemiological evidence. J Natl Cancer Inst 96 (2): 99-106, 2004.14734699
Hashibe M, Brennan P, Benhamou S, et al.: Alcohol drinking in never users of tobacco, cigarette smoking in never drinkers, and the risk of head and neck cancer: pooled analysis in the International Head and Neck Cancer Epidemiology Consortium. J Natl Cancer Inst 99 (10): 777-89, 2007.17505073
IARC Working Group on the Evaluation of Carcinogenic Risks to Humans: Smokeless tobacco and some tobacco-specific N-nitrosamines. IARC Monogr Eval Carcinog Risks Hum 89: 1-592, 2007.18335640
Purdue MP, Hashibe M, Berthiller J, et al.: Type of alcoholic beverage and risk of head and neck cancer--a pooled analysis within the INHANCE Consortium. Am J Epidemiol 169 (2): 132-42, 2009.19064644
Islami F, Tramacere I, Rota M, et al.: Alcohol drinking and laryngeal cancer: overall and dose-risk relation--a systematic review and meta-analysis. Oral Oncol 46 (11): 802-10, 2010.20833578
Hashibe M, Brennan P, Chuang SC, et al.: Interaction between tobacco and alcohol use and the risk of head and neck cancer: pooled analysis in the International Head and Neck Cancer Epidemiology Consortium. Cancer Epidemiol Biomarkers Prev 18 (2): 541-50, 2009.19190158
Lubin JH, Purdue M, Kelsey K, et al.: Total exposure and exposure rate effects for alcohol and smoking and risk of head and neck cancer: a pooled analysis of case-control studies. Am J Epidemiol 170 (8): 937-47, 2009.19745021
Mello FW, Melo G, Pasetto JJ, et al.: The synergistic effect of tobacco and alcohol consumption on oral squamous cell carcinoma: a systematic review and meta-analysis. Clin Oral Investig 23 (7): 2849-2859, 2019.31111280
Hobbs CG, Sterne JA, Bailey M, et al.: Human papillomavirus and head and neck cancer: a systematic review and meta-analysis. Clin Otolaryngol 31 (4): 259-66, 2006.16911640
D'Souza G, Kreimer AR, Viscidi R, et al.: Case-control study of human papillomavirus and oropharyngeal cancer. N Engl J Med 356 (19): 1944-56, 2007.17494927
Steinau M, Saraiya M, Goodman MT, et al.: Human papillomavirus prevalence in oropharyngeal cancer before vaccine introduction, United States. Emerg Infect Dis 20 (5): 822-8, 2014.24751181
Marron M, Boffetta P, Zhang ZF, et al.: Cessation of alcohol drinking, tobacco smoking and the reversal of head and neck cancer risk. Int J Epidemiol 39 (1): 182-96, 2010.19805488
Herrero R, Quint W, Hildesheim A, et al.: Reduced prevalence of oral human papillomavirus (HPV) 4 years after bivalent HPV vaccination in a randomized clinical trial in Costa Rica. PLoS One 8 (7): e68329, 2013.23873171
Chaturvedi AK, Graubard BI, Broutian T, et al.: Effect of Prophylactic Human Papillomavirus (HPV) Vaccination on Oral HPV Infections Among Young Adults in the United States. J Clin Oncol 36 (3): 262-267, 2018.29182497

## Incidence and Mortality

Oral cavity and oropharynx cancers

From 2017 to 2021, the estimated age-adjusted incidence rate for cancers of the oral cavity and oropharynx in the United States was 11.5 cases per 100,000 persons per year.[1] Cancers of the tongue, oropharynx, and tonsil comprise the majority of cases (30% tongue and 24% oropharynx and tonsil). The estimated age-adjusted mortality rate for cancers of the oral cavity and oropharynx from 2018 to 2022 was 2.6 per 100,000 persons per year. U.S. incidence rates are about 1.7 times higher in men than in women. However, mortality rates are about 1.9 times higher in men than in women.[1] It is estimated that there will be 59,660 new cases of oral cavity and oropharynx cancer diagnosed in the United States in 2025 and 12,770 deaths due to these diseases.[2] Rates of oral cavity cancer vary greatly across the world, primarily because of differences in alcohol use, tobacco use, and betel-quid chewing and the products chewed.[3]

Although localized cancers of the oral cavity and oropharynx have an excellent anticipated 5-year survival rate of about 87.5%, only 26.4% of these cancer cases are diagnosed at this stage.[1] The overall 5-year relative survival rate for patients with cancers of the oral cavity and oropharynx combined is only 69%.[2] However, the 5-year relative survival rate is much lower in Black patients (57%) than in White patients (71%).[2] Additionally, the 5-year survival rate varies greatly by cancer site, with 52.1% survival among patients with cancer on the floor of the mouth and 73.8% survival among patients with cancer in the oropharynx and tonsil.[4]

Hypopharyngeal cancer

Hypopharyngeal cancers are rare, with approximately 2,500 new cases diagnosed in the United States each year and an annual incidence of 0.6 cases per 100,000 persons.[5] The 5-year survival rate for hypopharyngeal cancer is 35%.[5] New cases have been falling an average of 2% per year over the last 20 years.[5] This has been attributed to a reduction in cigarette smoking.

Laryngeal cancer

Laryngeal cancers are less common, with an annual incidence of 2.6 cases per 100,000 persons.[6] It is estimated that 13,020 new cases of laryngeal cancer will be diagnosed in the United States in 2025, and an estimated 3,910 individuals will die of this disease.[2] The 5-year relative survival rate for laryngeal cancer is 62%.[2] Age-adjusted death rates have been falling on average 1.6% each year from 2013 to 2022.[6] This has been attributed to a reduction in cigarette smoking.

### References

National Cancer Institute: SEER Cancer Stat Facts: Oral Cavity and Pharynx Cancer. National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/oralcav.html). Last accessed December 30, 2024.
American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Shield KD, Ferlay J, Jemal A, et al.: The global incidence of lip, oral cavity, and pharyngeal cancers by subsite in 2012. CA Cancer J Clin 67 (1): 51-64, 2017.28076666
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
Kuo P, Chen MM, Decker RH, et al.: Hypopharyngeal cancer incidence, treatment, and survival: temporal trends in the United States. Laryngoscope 124 (9): 2064-9, 2014.25295351
National Cancer Institute: SEER Cancer Stat Facts: Laryngeal Cancer. National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/laryn.html). Last accessed April 14, 2025.

## Factors With Adequate Evidence of an Increased Risk of Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers

### Tobacco Use

Tobacco use is implicated in most cases of oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers.[1] All forms of tobacco use (cigarettes, pipes, cigars, snuff, chewing tobacco, gutka [betel quid with tobacco added], and other smoked and smokeless products) increase the risk of these cancers.[1,2] Epidemiological studies consistently demonstrate that cigarette smokers have a higher incidence of mortality from head and neck squamous cell cancers compared with lifetime nonsmokers, and there is general consensus that the relationship is causal. Risk for current smokers ranges from fourfold to fivefold for oral cavity, oropharyngeal, and hypopharyngeal cancers to tenfold for laryngeal cancer when compared with never-smokers.[3] However, other epidemiological studies have observed smaller and larger increases in risk, with some variation by anatomic location. Betel-quid chewing is prevalent in many countries in south and southeast Asia, including China and India, and is an important risk factor for both oral cavity and oropharyngeal cancers.[4]

### Alcohol Use

Alcohol use is a major independent risk factor for the development of head and neck squamous cell cancer.[5] Most epidemiological studies demonstrate an increase in risk with increasing drinks per day, with a more than twofold to sixfold increase in risk for individuals who consume two or more drinks a day relative to nonconsumers.[6] Associations are observed in studies that adjust for confounding by smoking, as well as in studies of nonsmokers.[7] There is a suggestion that consumption of beer and hard liquor confers a greater risk than does wine consumption.[6]

### Tobacco and Alcohol Use

Head and neck squamous cell cancer risk is highest in people who consume large amounts of both alcohol and tobacco.[8-10] When both risk factors are present, the risk of oral cavity and oropharyngeal cancer is typically about two to three times greater than a simple multiplicative or additive effect.[11] In a study that pooled data from 17 case-control studies, individuals who consumed more than a pack of cigarettes and three or more alcoholic drinks per day had a 15-fold increased risk of oral cavity cancer, 14-fold increased risk of oropharyngeal cancer, and 36-fold increased risk of laryngeal cancer relative to individuals who neither smoked nor drank.[8,11]

### Betel-Quid Chewing

Betel quid is composed of betel leaf, areca nut, and lime; gutka is betel quid with added tobacco. Both betel-quid and gutka chewing increase the risk of cancer of the oral cavity and oropharynx.[4,12] The carcinogenic component of chewed betel quid arises from the areca nut.[4]

Relative risks are typically stronger for betel quid with tobacco than for betel quid alone.[12] A meta-analysis of oral cavity cancer studies conducted on the Indian subcontinent calculated a statistically significant eightfold increase in risk for betel quid with tobacco and a statistically significant twofold increase in risk for betel quid alone.[12] A statistically significant tenfold increase in oral cavity cancer risk for betel-quid chewing was demonstrated by studies conducted in China or Taiwan. A meta-analysis of oropharyngeal cancer studies conducted on the Indian subcontinent calculated a statistically significant fourfold increase in risk for betel quid with tobacco and a statistically significant twofold increase in risk for betel quid alone.[12] Studies of head and neck cancer (without specification of subsite) suggest that increases in risk are positively correlated with chewing frequency and duration.[4]

### Human Papillomavirus (HPV) Infection

HPV type 16 (HPV-16) infection is a sufficient, but not necessary, cause of head and neck cancers, with a greater causal relationship with oropharyngeal cancer.[13,14] A meta-analysis of five case-control studies of HPV-16 positivity in either serum or tissue calculated an odds ratio of 15.1 (95% confidence interval [CI], 6.8–33.7) for cancer of the tonsils, 4.3 (95% CI, 2.1–8.9) for other oropharyngeal sites, and 2.0 for both oral cavity (95% CI, 1.2–3.4) and larynx (95% CI, 1.0–4.2).[14] In a case-control study, the observed strong association of HPV-16 serologic status and oropharyngeal cancer did not vary at different levels of tobacco or alcohol use.[15] HPV-16 E6 seroconversion was shown to occur over a range of 6 to 28 years before oropharyngeal cancer diagnosis, at a median age of 52 years.[16] Thus, the HPV-16 infection that increases the risk of oropharyngeal cancer may occur in individuals aged 20 to 40 years. A recent national survey observed that men have a higher prevalence of oral HPV than women (11.5% vs. 3.2%), including high-risk HPV subtypes (7.3% of men; 1.4% of women).[17]

Other high-risk HPV subtypes, including HPV type 18, have been found in a smaller proportion of oropharyngeal cancers.[15,18]

### References

IARC Working Group on the Evaluation of Carcinogenic Risks to Humans: Personal habits and indoor combustions. Volume 100 E. A review of human carcinogens. IARC Monogr Eval Carcinog Risks Hum 100 (Pt E): 1-538, 2012.23193840
U.S. Department of Health and Human Services: The Health Consequences of Smoking—50 Years of Progress: A Report of the Surgeon General. U.S. Department of Health and Human Services, CDC, National Center for Chronic Disease Prevention and Health Promotion, Office on Smoking and Health, 2014. Also available online (https://www.ncbi.nlm.nih.gov/books/NBK179276/). Last accessed December 30, 2024.
Vineis P, Alavanja M, Buffler P, et al.: Tobacco and cancer: recent epidemiological evidence. J Natl Cancer Inst 96 (2): 99-106, 2004.14734699
IARC Working Group on the Evaluation of Carcinogenic Risks to Humans: Betel-quid and areca-nut chewing and some areca-nut derived nitrosamines. IARC Monogr Eval Carcinog Risks Hum 85: 1-334, 2004.15635762
Hashibe M, Brennan P, Benhamou S, et al.: Alcohol drinking in never users of tobacco, cigarette smoking in never drinkers, and the risk of head and neck cancer: pooled analysis in the International Head and Neck Cancer Epidemiology Consortium. J Natl Cancer Inst 99 (10): 777-89, 2007.17505073
Purdue MP, Hashibe M, Berthiller J, et al.: Type of alcoholic beverage and risk of head and neck cancer--a pooled analysis within the INHANCE Consortium. Am J Epidemiol 169 (2): 132-42, 2009.19064644
Goldstein BY, Chang SC, Hashibe M, et al.: Alcohol consumption and cancers of the oral cavity and pharynx from 1988 to 2009: an update. Eur J Cancer Prev 19 (6): 431-65, 2010.20679896
Hashibe M, Brennan P, Chuang SC, et al.: Interaction between tobacco and alcohol use and the risk of head and neck cancer: pooled analysis in the International Head and Neck Cancer Epidemiology Consortium. Cancer Epidemiol Biomarkers Prev 18 (2): 541-50, 2009.19190158
Lubin JH, Purdue M, Kelsey K, et al.: Total exposure and exposure rate effects for alcohol and smoking and risk of head and neck cancer: a pooled analysis of case-control studies. Am J Epidemiol 170 (8): 937-47, 2009.19745021
Mello FW, Melo G, Pasetto JJ, et al.: The synergistic effect of tobacco and alcohol consumption on oral squamous cell carcinoma: a systematic review and meta-analysis. Clin Oral Investig 23 (7): 2849-2859, 2019.31111280
Blot WJ, McLaughlin JK, Winn DM, et al.: Smoking and drinking in relation to oral and pharyngeal cancer. Cancer Res 48 (11): 3282-7, 1988.3365707 88210327
Guha N, Warnakulasuriya S, Vlaanderen J, et al.: Betel quid chewing and the risk of oral and oropharyngeal cancers: a meta-analysis with implications for cancer control. Int J Cancer 135 (6): 1433-43, 2014.24302487
Kreimer AR, Johansson M, Waterboer T, et al.: Evaluation of human papillomavirus antibodies and risk of subsequent head and neck cancer. J Clin Oncol 31 (21): 2708-15, 2013.23775966
Hobbs CG, Sterne JA, Bailey M, et al.: Human papillomavirus and head and neck cancer: a systematic review and meta-analysis. Clin Otolaryngol 31 (4): 259-66, 2006.16911640
D'Souza G, Kreimer AR, Viscidi R, et al.: Case-control study of human papillomavirus and oropharyngeal cancer. N Engl J Med 356 (19): 1944-56, 2007.17494927
Kreimer AR, Ferreiro-Iglesias A, Nygard M, et al.: Timing of HPV16-E6 antibody seroconversion before OPSCC: findings from the HPVC3 consortium. Ann Oncol 30 (8): 1335-1343, 2019.31185496
Sonawane K, Suk R, Chiao EY, et al.: Oral Human Papillomavirus Infection: Differences in Prevalence Between Sexes and Concordance With Genital Human Papillomavirus Infection, NHANES 2011 to 2014. Ann Intern Med 167 (10): 714-724, 2017.29049523
Steinau M, Saraiya M, Goodman MT, et al.: Human papillomavirus prevalence in oropharyngeal cancer before vaccine introduction, United States. Emerg Infect Dis 20 (5): 822-8, 2014.24751181

## Interventions With Adequate Evidence of a Decreased Risk of Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers

### Tobacco Cessation

The cessation of cigarette smoking is associated with an approximately 50% reduction in risk of developing oral cavity, oropharyngeal, and hypopharyngeal cancers within 5 to 9 years,[1] and a return to a cancer risk comparable to that of never-smokers within 20 years.[1] For laryngeal cancer, the risk reduction is approximately 40% within 5 to 9 years, and a similar return to cancer risk comparable to that of never-smokers within 20 years.[1]

### References

Marron M, Boffetta P, Zhang ZF, et al.: Cessation of alcohol drinking, tobacco smoking and the reversal of head and neck cancer risk. Int J Epidemiol 39 (1): 182-96, 2010.19805488

## Interventions With Inadequate Evidence of a Reduced Risk of Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers

### Cessation of Alcohol Consumption

Because alcohol is associated with oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers in a dose-dependent fashion, it is believed that cessation or avoidance of alcohol use would result in reduced incidence. Most studies suggest that the risk of oral cavity and laryngeal cancer decreases as time from cessation increases; one pooled analysis of 13 studies observed a statistically significant reduction (odds ratio [OR], 0.45; 95% confidence interval [CI], 0.26–0.78) for oral cavity and laryngeal cancers (OR, 0.69; 95% CI, 0.52–0.91), relative to current drinkers, for those who ceased consumption 20 years or more ago. Among never-smokers, cessation of alcohol consumption leads to a decrease in oral cavity and laryngeal cancer risk more than 1 to 4 years after cessation. Data for oropharyngeal and hypopharyngeal cancers did not support risk reduction with alcohol cessation.[1]

### Vaccination Against Human Papillomavirus (HPV) Type 16 (HPV-16) and Other High-Risk Subtypes

Vaccination against HPV-16 and type 18 (HPV-18) has been shown to prevent approximately 90% of oral HPV-16/HPV-18 infections within 4 years of vaccination.[2 ,3] Given the relatively recent adoption of vaccination and the age at which individuals are vaccinated, there is not yet evidence that vaccination at a young age will lead to a substantially reduced risk of HPV-associated oropharyngeal cancer later in life. In addition, no data are available to examine whether incidence or mortality would be reduced if vaccination occurred at an age closer to that at which oropharyngeal cancers tend to present.

### References

Marron M, Boffetta P, Zhang ZF, et al.: Cessation of alcohol drinking, tobacco smoking and the reversal of head and neck cancer risk. Int J Epidemiol 39 (1): 182-96, 2010.19805488
Herrero R, Quint W, Hildesheim A, et al.: Reduced prevalence of oral human papillomavirus (HPV) 4 years after bivalent HPV vaccination in a randomized clinical trial in Costa Rica. PLoS One 8 (7): e68329, 2013.23873171
Chaturvedi AK, Graubard BI, Broutian T, et al.: Effect of Prophylactic Human Papillomavirus (HPV) Vaccination on Oral HPV Infections Among Young Adults in the United States. J Clin Oncol 36 (3): 262-267, 2018.29182497

## Latest Updates to This Summary (04/14/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Incidence and Mortality

Updated statistics with estimated new cases and deaths for oral cavity and pharynx cancer for 2025 (cited American Cancer Society as reference 2).

Updated statistics with estimated new cases and deaths for laryngeal cancer for 2025.

This summary is written and maintained by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers prevention. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Screening and Prevention Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers Prevention. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/head-and-neck/hp/oral-prevention-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389416]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).